# Selected Vegetables/Sun's Soup (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the use of selected vegetables/Sun's soup in the treatment of people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board.

## Overview

NOTE: There is either no new research on this topic or the recent published research is weak and not appropriate for inclusion in the summary. Therefore, the information in this summary is no longer being updated and is provided for reference purposes only.

- “Selected Vegetables” and “Sun's Soup” are different mixtures of vegetables and herbs that are being studied as treatments for people with cancer (see Question 1).
- Dried and frozen forms of Selected Vegetables are sold in the United States as dietary supplements (see Question 1).
- The vegetables and herbs in Selected Vegetables/Sun’s Soup may contain substances that block the growth of cancer cells and/or help the body's immune system kill cancer cells (see Question 2).
- Researchers reported that the growth of tumors was slower in the mice that were fed ingredients in Selected Vegetables/Sun's Soup, compared to the mice that ate standard food (see Question 5).
- Researchers reported that some cancer patients lived longer and had better quality of life when they received Selected Vegetables/Sun’s Soup along with other treatments. Randomized controlled trials, enrolling larger numbers of people, are needed to confirm the results (see Question 6).
- No mixture of Selected Vegetables/Sun’s Soup has been approved by the U. S. Food and Drug Administration for the treatment of cancer or any other medical condition (see Question 8).

## Questions and Answers About Selected Vegetables/Sun’s Soup

1. What is Selected Vegetables/Sun’s Soup?
  “Selected Vegetables” and “Sun's Soup” are names given to several different mixtures of vegetables and herbs that are being studied as treatments for cancer and other medical conditions, including acquired immunodeficiency syndrome (AIDS). The following versions have been used:
  - Original Mixture
    - Shiitake mushroom.
    - Mung beans.
    - Hedyotis diffusa.
    - Scutellaria barbata (barbat skullcap).
    This mixture is not sold in the United States.
  - Freeze-dried Selected Vegetables (DSV), a freeze-dried mixture of vegetables and herbs sold in the United States as a dietary supplement. DSV is reported to contain the following ingredients:
    - Soybean.
    - Shiitake mushroom.
    - Mung bean.
    - Red date.
    - Scallion.
    - Garlic.
    - Leek.
    - Lentils.
    - Hawthorn fruit.
    - Onion.
    - Ginseng.
    - Angelica root.
    - Licorice.
    - Dandelion root.
    - Senega root.
    - Ginger.
    - Olive.
    - Sesame seed.
    - Parsley.
  - Frozen Selected Vegetables (FSV), a frozen mixture of fresh vegetables and herbs, sold in the United States as a dietary supplement. It contains the same vegetables and herbs as in DSV.
2. What is the history of the discovery and use of Selected Vegetables/Sun’s Soup as a complementary and alternative treatment for cancer?
  The vegetable and herb mixture now called Selected Vegetables/Sun’s Soup was developed to treat cancer.
  - In the mid-1980's, the developer created the mixture to treat a relative who was diagnosed with stage IV non-small cell lung cancer and not helped by standard treatment. The mixture contained shiitake mushroom, mung bean, and the herbs Hedyotis diffusa and barbat skullcap. The developer believed these ingredients contain substances that may block the growth of cancer cells and/or help the body's immune system attack cancer cells. The relative was reported to be alive and free of cancer more than 13 years later. Three more patients with advanced cancer were treated with a combination of shiitake mushroom and mung bean. These patients were also reported to benefit from the treatment.
  - In 1992, the developer applied for a patent for Selected Vegetables/Sun’s Soup as an herbal treatment of cancer. The developer reported on animal studies done in mice (see Question 5). The developer then began doing clinical trials (see Question 6) to test Selected Vegetables/Sun’s Soup in cancer patients.
  - In 1995, the developer was awarded a patent for Selected Vegetables/Sun’s Soup.
  Many of the vegetables and herbs in Selected Vegetables/Sun’s Soup were chosen because previous research and traditional Chinese medicine suggest they contain anticancer phytochemicals (substances found in plants that may have effects on the body). These include substances such as protease inhibitors, plant sterols, and isoflavones. These ingredients may block the growth of cancer cells and/or improve the way the body's immune system attacks cancer cells.
3. What is the theory behind the claim that Selected Vegetables/Sun’s Soup is useful in treating cancer?
  The theory is that certain ingredients in Selected Vegetables/Sun's Soup may contain phytochemicals that have significant anticancer effects in humans. One of these ingredients is shiitake mushroom. Lentinan, which is taken from shiitake mushroom, has been used in Japan to treat stomach and colon cancer after surgery. Treatment with lentinan is reported to help patients with stomach cancer live longer and have a better quality of life. Lentinan may not be easily absorbed by the body from food, so it is usually given by injection. Other substances in shiitake mushroom that are more easily used by the body from food have shown anticancer activity in animal tests.
4. How is Selected Vegetables/Sun’s Soup administered?
  Selected Vegetables/Sun’s Soup is eaten as part of the diet. Daily doses of either 1 ounce of the DSV (mixed with water or other soup) or 10 ounces of the FSV were used in clinical trials.
5. Have any preclinical (laboratory or animal) studies been conducted using Selected Vegetables/Sun’s Soup?
  Few preclinical studies have been done with Selected Vegetables/Sun’s Soup. Research in a laboratory or using animals is done to find out if a drug, procedure, or treatment is likely to be useful in humans. Preclinical studies are done before clinical trials (in humans) are begun.
  A small number of mice were injected with tumor cells and fed either standard food or food mixed with one or more ingredients from Selected Vegetables/Sun’s Soup. The researchers reported that the growth of tumors was slower in the mice that were fed the Selected Vegetables/Sun’s Soup ingredients, compared to the mice that ate standard food. The tumor growth was slowest when the mice were fed both mung bean and shiitake mushroom.
6. Have any clinical trials (research studies with people) of Selected Vegetables/Sun’s Soup been conducted?
  Clinical trials using Selected Vegetables/Sun’s Soup to treat cancer have been done with small numbers of patients. These patients received other types of treatment, either before or during treatment with Selected Vegetables/Sun’s Soup, and different vegetable mixtures were used in the different studies.
  The results of these trials were compared with published information on similar patients who did not receive Selected Vegetables/Sun’s Soup. Most patients receiving the vegetable mixtures lived longer, were better able to carry out their daily activities, and either gained weight or did not lose weight. In some patients who ate Selected Vegetables/Sun’s Soup, tumor growth slowed or the tumor completely went away. Because patients in these trials received other treatments, it is not known if their responses were caused by Selected Vegetables/Sun’s Soup, the other treatments, or both. None of the trials were randomized or controlled. Randomized clinical trials give the highest level of evidence. In randomized trials, volunteers are put randomly (by chance) into one of 2 or more groups that compare different treatments. In a controlled trial, one group (called the control group) does not receive the new treatment being studied. The control group is then compared to the groups that receive the new treatment, to see if the new treatment works. Randomized controlled trials, enrolling larger numbers of people, are needed to confirm the results of studies done so far on Selected Vegetables/Sun’s Soup.
  One randomized clinical trial (NCT00246727 (https://www.cancer.gov/clinicaltrials/NCT00246727)) of patients with stage IIIB or stage IV non-small cell lung cancer was conducted. The trial compared the survival of patients receiving Selected Vegetables/Sun's Soup with patients receiving a placebo (inactive substance). Both groups received treatment with supportive care, such as radiation therapy, surgery, or palliative care.
7. Have any side effects or risks been reported from Selected Vegetables/Sun’s Soup?
  No harmful side effects or risks have been reported in the use of Selected Vegetables/Sun’s Soup. Some patients felt full or bloated after eating the dry form, but patients who ate the frozen mixture did not report this.
8. Is Selected Vegetables/Sun’s Soup approved by the U.S. Food and Drug Administration (FDA) for use as a cancer treatment in the United States?
  The FDA has not approved any form of Selected Vegetables/Sun’s Soup for the treatment of cancer or any other medical condition. Well-designed clinical trials that test identical mixtures of vegetables and herbs are needed to prove whether Selected Vegetables/Sun’s Soup is useful in treating cancer.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the use of selected vegetables/Sun's soup in the treatment of people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Selected Vegetables/Sun's Soup. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/patient/suns-soup-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389411]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).

## General CAM Information

Complementary and alternative medicine (CAM)—also called integrative medicine—includes a broad range of healing philosophies, approaches, and therapies. A therapy is generally called complementary when it is used in addition to conventional treatments; it is often called alternative when it is used instead of conventional treatment. (Conventional treatments are those that are widely accepted and practiced by the mainstream medical community.) Depending on how they are used, some therapies can be considered either complementary or alternative. Complementary and alternative therapies are used in an effort to prevent illness, reduce stress, prevent or reduce side effects and symptoms, or control or cure disease.

Unlike conventional treatments for cancer, complementary and alternative therapies are often not covered by insurance companies. Patients should check with their insurance provider to find out about coverage for complementary and alternative therapies.

Cancer patients considering complementary and alternative therapies should discuss this decision with their doctor, nurse, or pharmacist as they would any type of treatment. Some complementary and alternative therapies may affect their standard treatment or may be harmful when used with conventional treatment.

## Evaluation of CAM Therapies

It is important that the same scientific methods used to test conventional therapies are used to test CAM therapies. The National Cancer Institute and the National Center for Complementary and Integrative Health (NCCIH) are sponsoring a number of clinical trials (research studies) at medical centers to test CAM therapies for use in cancer.

Conventional approaches to cancer treatment have generally been studied for safety and effectiveness through a scientific process that includes clinical trials with large numbers of patients. Less is known about the safety and effectiveness of complementary and alternative methods. Few CAM therapies have been tested using demanding scientific methods. A small number of CAM therapies that were thought to be purely alternative approaches are now being used in cancer treatment—not as cures, but as complementary therapies that may help patients feel better and recover faster. One example is acupuncture. According to a panel of experts at a National Institutes of Health (NIH) meeting in November 1997, acupuncture has been found to help control nausea and vomiting caused by chemotherapy and pain related to surgery. However, some approaches, such as the use of laetrile, have been studied and found not to work and to possibly cause harm.

The NCI Best Case Series Program (https://cam.cancer.gov/indentifying_novel_cam_therapies/best_case_series_program.htm) which was started in 1991, is one way CAM approaches that are being used in practice are being studied. The program is overseen by the NCI’s Office of Cancer Complementary and Alternative Medicine (OCCAM). Health care professionals who offer alternative cancer therapies submit their patients’ medical records and related materials to OCCAM. OCCAM carefully reviews these materials to see if any seem worth further research.

## Questions to Ask Your Health Care Provider About CAM

When considering complementary and alternative therapies, patients should ask their health care provider the following questions:

- What side effects can be expected?
- What are the risks related to this therapy?
- What benefits can be expected from this therapy?
- Do the known benefits outweigh the risks?
- Will the therapy affect conventional treatment?
- Is this therapy part of a clinical trial?
- If so, who is the sponsor of the trial?
- Will the therapy be covered by health insurance?

## To Learn More About CAM

National Center for Complementary and Integrative Health (NCCIH)

The National Center for Complementary and Integrative Health (NCCIH) at the National Institutes of Health (NIH) facilitates research and evaluation of complementary and alternative practices, and provides information about a variety of approaches to health professionals and the public.

- NCCIH Clearinghouse
- Post Office Box 7923 Gaithersburg, MD 20898–7923
- Telephone: 1-888-644-6226 (toll free)
- TTY (for deaf and hard of hearing callers): 1-866-464-3615
- E-mail: info@nccih.nih.gov
- Website: https://nccih.nih.gov

CAM on PubMed

NCCIH and the NIH National Library of Medicine (NLM) jointly developed CAM on PubMed (https://nccih.nih.gov/research/camonpubmed), a free and easy-to-use search tool for finding CAM-related journal citations. As a subset of the NLM's PubMed bibliographic database, CAM on PubMed features more than 230,000 references and abstracts for CAM-related articles from scientific journals. This database also provides links to the websites of over 1,800 journals, allowing users to view full-text articles. (A subscription or other fee may be required to access full-text articles.)

Office of Cancer Complementary and Alternative Medicine

The NCI Office of Cancer Complementary and Alternative Medicine (OCCAM) coordinates the activities of the NCI in the area of complementary and alternative medicine (CAM). OCCAM supports CAM cancer research and provides information about cancer-related CAM to health providers and the general public via the NCI website (https://www.cancer.gov/).

National Cancer Institute (NCI) Cancer Information Service

U.S. residents may call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, toll free at 1-800-4-CANCER (1-800-422-6237) Monday through Friday from 9:00 am to 9:00 pm. A trained Cancer Information Specialist is available to answer your questions.

Food and Drug Administration

The Food and Drug Administration (FDA) regulates drugs and medical devices to ensure that they are safe and effective.

- Food and Drug Administration
- 10903 New Hampshire Avenue
- Silver Spring, MD 20993
- Telephone: 1-888-463-6332 (toll free)
- Website: http://www.fda.gov

Federal Trade Commission

The Federal Trade Commission (FTC) enforces consumer protection laws. Publications available from the FTC include:

- Who Cares: Sources of Information About Health Care Products and Services
- Fraudulent Health Claims: Don’t Be Fooled

- Consumer Response Center
- Federal Trade Commission
- 600 Pennsylvania Avenue, NW
- Washington, DC 20580
- Telephone: 1-877-FTC-HELP (1-877-382-4357) (toll free)
- TTY (for deaf and hard of hearing callers): 202-326-2502
- Website: http://www.ftc.gov